# Stomach (Gastric) Cancer Prevention (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about stomach (gastric) cancer prevention. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Screening and Prevention Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## Overview

Note: The Overview section summarizes the published evidence on this topic. The rest of the summary describes the evidence in more detail.

Other PDQ summaries on Stomach (Gastric) Cancer Screening; Gastric Cancer Treatment; and Levels of Evidence for Cancer Screening and Prevention Studies are also available.

### Who Is at Risk?

People at elevated risk for gastric cancer include older adults with atrophic gastritis or pernicious anemia; patients with sporadic gastric adenomas,[1] familial adenomatous polyposis,[2] or hereditary nonpolyposis colon cancer;[3] and immigrant ethnic populations from countries with high rates of gastric carcinoma.[4,5] Workers in the rubber and coal industries are also at increased risk.[6]

Risk factors for gastric cancer include the presence of precursor conditions such as chronic atrophic gastritis and intestinal metaplasia, pernicious anemia, and gastric adenomatous polyps. Genetic factors include a family history of gastric cancer, Li Fraumeni syndrome, and type A blood type.[6] Environmental factors include low consumption of fruits and vegetables; consumption of salted, smoked, or poorly preserved foods; cigarette smoking; and radiation exposure.[6-8]

There is consistent evidence that Helicobacter pylori infection, also known as H. pylori infection, of the stomach is strongly associated with both the initiation and promotion of carcinoma of the gastric body and antrum and of gastric lymphoma.[9-11] The International Agency for Research on Cancer classifies H. pylori infection as a cause of noncardia gastric carcinoma and gastric, low-grade, B-cell mucosa-associated lymphoid tissue or mucosa-associated lymphatic tissue (MALT) lymphoma (i.e., a Group 1 human carcinogen).[12,13] Gastric cancer has been observed to be more common among individuals who use proton pump inhibitors (PPIs), relative to nonusers, after apparent successful H. pylori eradication therapy.[14] However, confounding and detection bias cannot be ruled out as explanations.

There is consistent and solid evidence that Epstein-Barr virus (EBV) infection is strongly associated with gastric cancer. A systematic review and meta-analysis of 71 articles (4 from the United States) assessed the prevalence and association of EBV and gastric cancer. EBV infection was associated with a large increase in gastric cancer risk. The pooled prevalence of EBV in 20,361 patients with gastric cancer was 8.77% (95% confidence interval [CI], 7.73%–9.92%; I^2^ statistic, 83.2%). Results were consistent across studies, although heterogenous. The pooled odds ratios (ORs) for gastric cancer were 18.56 (95% CI, 15.68–21.97; I^2^ statistic, 55.4%) for studies (kappa statistic, 20; n = 4,116 patients with cancer) with matched pairs design (including tumor and tumor-adjacent normal tissues) and 3.31 (95% CI, 0.95–11.54; I^2^ statistic, 55.0%) for studies with nonmatched pairs design. The proportion of EBV-associated gastric cancer among males was significantly higher than among females (10.8% vs. 5.7%) (P < .0001). However, the pooled OR estimate for EBV-associated gastric cancer was significantly higher among females (21.47; 95% CI, 15.55–29.63; I^2^ statistic, 0%) than among males (14.07; 95% CI, 10.46–18.93; I^2^ statistic, 49.0%) (P = .06). EBV was more prevalent in the cardia (12.5%) and the body (11.7%) compared with the antrum (6.3%) (P = .0002).[15]

Compared with the general population, people with duodenal ulcer disease may have a lower risk of gastric cancer.[16]

### Interventions for Reduction of Stomach (Gastric) Cancer Risk

#### Smoking cessation

Based on solid evidence, smoking is associated with an increased risk of stomach cancer.[17-19] The 2004 Surgeon General’s report identifies cigarette smoking as a cause of stomach cancer, with an average relative risk (RR) in former smokers of 1.2 and in current smokers of 1.6.[20] Compared with persistent smokers, the risk of stomach cancer decreases among former smokers with time since cessation. This pattern of observations makes it reasonable to infer that cigarette smoking prevention or cessation would result in a decreased risk of gastric cancer.

Magnitude of Effect: A systematic review and meta-analysis showed a 60% increase in gastric cancer in male smokers and a 20% increase in gastric cancer in female smokers compared with nonsmokers.[17]

- Study Design: Evidence obtained from case-control and cohort studies.
- Internal Validity: Good.
- Consistency: Good.
- External Validity: Good.

#### H. pylori infection eradication

Based on solid evidence, H. pylori infection is associated with an increased risk of gastric cancer. A meta-analysis of seven randomized studies, all conducted in areas of high-risk gastric cancer and all but one conducted in Asia, suggested that treatment of H. pylori may reduce gastric cancer risk (from 1.7% to 1.1%; RR, 0.65; 95% CI, 0.43–0.98).[21] Only two studies assessed gastric cancer incidence as the primary study outcome, and two different studies were double blinded. It is unclear how generalizable the results may be to the North American population.

In the initial report from a randomized clinical trial, 3,365 participants were followed in an intention-to-treat analysis. Short-term treatment with amoxicillin and omeprazole was associated with a 39% reduction in gastric cancer incidence during a period of 15 years after randomization.[22] With follow-up to 22 years, there was a reduction in both incidence and mortality.[23] A single-center randomized clinical trial in China included a total of 1,676 participants who were at higher risk of developing gastric cancer (elevated roughly threefold) because they had a first-degree relative with gastric cancer. Participants were randomly assigned to treatment with lansoprazole, amoxicillin, and clarithromycin or placebo for 7 days. After 9.2 years, this treatment regimen resulted in a reduction in gastric cancer, from 2.7% in the placebo group (23 individuals) to 1.2% in the treatment group (10 individuals), with a hazard ratio of 0.45 (95% CI, 0.21–0.94). No reduction in gastric cancer mortality was found, but the power to detect any difference was low.[24]

Magnitude of Effect: Risk of gastric cancer and gastric cancer mortality may be reduced.

- Study Design: Randomized controlled trials of H. pylori eradication.
- Internal Validity: Good.
- Consistency: Good.
- External Validity: Good.

### Interventions With Inadequate Evidence as to Whether They Reduce the Risk of Stomach (Gastric) Cancer

#### Diet

Based on fair evidence, excessive salt intake, and deficient dietary consumption of fresh fruits and vegetables are associated with an increased risk of gastric cancer. Dietary intake of vitamin C contained in vegetables, fruits, and other foods of plant origin is associated with a reduced risk of gastric cancer. Diets high in whole-grain cereals, carotenoids, allium compounds, and green tea are also associated with a reduced risk of this cancer. However, it is uncertain if changing one's diet to include more vegetables, fruits, and whole grains would reduce the risk of gastric cancer.

Magnitude of Effect: Small, difficult to determine.

- Study Design: Cohort or case-control studies.
- Internal Validity: Good.
- Consistency: Small number of studies.
- External Validity: Fair (populations vary greatly in their underlying nutritional status).

### References

MING SC, GOLDMAN H: Gastric polyps: a histogenetic classification and its relation to carcinoma. Cancer 18: 721-6, 1965.14297468
Utsunomiya J, Maki T, Iwama T, et al.: Gastric lesion of familial polyposis coli. Cancer 34 (3): 745-54, 1974.4852134 74301962
Aarnio M, Salovaara R, Aaltonen LA, et al.: Features of gastric cancer in hereditary non-polyposis colorectal cancer syndrome. Int J Cancer 74 (5): 551-5, 1997.9355980 98016057
Kurtz RC, Sherlock P: The diagnosis of gastric cancer. Semin Oncol 12 (1): 11-8, 1985.3975641 85142212
Boeing H: Epidemiological research in stomach cancer: progress over the last ten years. J Cancer Res Clin Oncol 117 (2): 133-43, 1991.2036128 91177935
Pisters PWT, Kelsen DP, Tepper JE: Cancer of the stomach. In: DeVita VT Jr, Hellman S, Rosenberg SA, eds.: Cancer: Principles and Practice of Oncology. Vols. 1 & 2. 8th ed. Lippincott Williams & Wilkins, 2008, pp 1043-1079.
Crew KD, Neugut AI: Epidemiology of gastric cancer. World J Gastroenterol 12 (3): 354-62, 2006.16489633
Leung WK, Wu MS, Kakugawa Y, et al.: Screening for gastric cancer in Asia: current evidence and practice. Lancet Oncol 9 (3): 279-87, 2008.18308253
Parsonnet J, Hansen S, Rodriguez L, et al.: Helicobacter pylori infection and gastric lymphoma. N Engl J Med 330 (18): 1267-71, 1994.8145781 94195344
Ando T, Goto Y, Maeda O, et al.: Causal role of Helicobacter pylori infection in gastric cancer. World J Gastroenterol 12 (2): 181-6, 2006.16482615
Aromaa A, Kosunen TU, Knekt P, et al.: Circulating anti-Helicobacter pylori immunoglobulin A antibodies and low serum pepsinogen I level are associated with increased risk of gastric cancer. Am J Epidemiol 144 (2): 142-9, 1996.8678045 96283058
IARC Working Group on the Evaluation of Carcinogenic Risks to Humans: A review of human carcinogens--Part B: biological agents. Volume 100. IARC Press, 2011.
Bouvard V, Baan R, Straif K, et al.: A review of human carcinogens--Part B: biological agents. Lancet Oncol 10 (4): 321-2, 2009.19350698
Cheung KS, Chan EW, Wong AYS, et al.: Long-term proton pump inhibitors and risk of gastric cancer development after treatment for Helicobacter pylori: a population-based study. Gut 67 (1): 28-35, 2018.29089382
Tavakoli A, Monavari SH, Solaymani Mohammadi F, et al.: Association between Epstein-Barr virus infection and gastric cancer: a systematic review and meta-analysis. BMC Cancer 20 (1): 493, 2020.32487043
Hansson LE, Nyrén O, Hsing AW, et al.: The risk of stomach cancer in patients with gastric or duodenal ulcer disease. N Engl J Med 335 (4): 242-9, 1996.8657240 96266386
Ladeiras-Lopes R, Pereira AK, Nogueira A, et al.: Smoking and gastric cancer: systematic review and meta-analysis of cohort studies. Cancer Causes Control 19 (7): 689-701, 2008.18293090
González CA, Pera G, Agudo A, et al.: Smoking and the risk of gastric cancer in the European Prospective Investigation Into Cancer and Nutrition (EPIC). Int J Cancer 107 (4): 629-34, 2003.14520702
La Torre G, Chiaradia G, Gianfagna F, et al.: Smoking status and gastric cancer risk: an updated meta-analysis of case-control studies published in the past ten years. Tumori 95 (1): 13-22, 2009 Jan-Feb.19366050
The Health Consequences of Smoking: A Report of the Surgeon General. U.S. Department of Health and Human Services, CDC, National Center for Chronic Disease Prevention and Health Promotion, Office on Smoking and Health, 2004. Also available online (https://www.ncbi.nlm.nih.gov/books/NBK44695/). Last accessed April 9, 2025.
Fuccio L, Zagari RM, Eusebi LH, et al.: Meta-analysis: can Helicobacter pylori eradication treatment reduce the risk for gastric cancer? Ann Intern Med 151 (2): 121-8, 2009.19620164
Ma JL, Zhang L, Brown LM, et al.: Fifteen-year effects of Helicobacter pylori, garlic, and vitamin treatments on gastric cancer incidence and mortality. J Natl Cancer Inst 104 (6): 488-92, 2012.22271764
Li WQ, Zhang JY, Ma JL, et al.: Effects of Helicobacter pylori treatment and vitamin and garlic supplementation on gastric cancer incidence and mortality: follow-up of a randomized intervention trial. BMJ 366: l5016, 2019.31511230
Choi IJ, Kim CG, Lee JY, et al.: Family History of Gastric Cancer and Helicobacter pylori Treatment. N Engl J Med 382 (5): 427-436, 2020.31995688

## Incidence and Mortality

Gastric cancer is the fifth most frequently diagnosed cancer and fifth leading cause of cancer-related mortality in the world,[1] although it is much rarer in the United States (1.5% of all new cancers).[2] The age-adjusted incidence rate for gastric cancer in the United States from 2017 to 2021 was 7.0 cases per 100,000 individuals. Incidence among men was nearly twice as high as among women.[3] Mortality rates for gastric cancer have been declining worldwide in recent decades, most prominently in the United States.[4,5] The mortality rate for White men in the United States was approximately 40 deaths per 100,000 men in 1930, compared with 2.8 deaths per 100,000 men from 2018 to 2022. The death rate from gastric cancer for Black men was 6.6 deaths per 100,000 men from 2018 to 2022.[3] The annual number of new cases seems to be steady in recent years. In 2025, an estimated 30,300 Americans will be diagnosed with gastric cancer, and 10,780 individuals will die of the disease.[2] Worldwide, the estimated number of cases per year in 2022 was 968,350, and the estimated number of deaths was 659,853. Age-standardized annual incidence rates vary widely across the world: from 3.6 to 23.0 cases per 100,000 in men, and from 3.3 to 9.7 cases per 100,000 in women. Incidence rates are markedly elevated in East Asia.[1]

Most gastric cancers in the United States are diagnosed at an advanced stage, which is reflected in an overall 5-year survival rate of 36.4% from 2014 to 2020.[3] Carcinomas localized to the mucosa or submucosa (early-stage cancers) have a much better prognosis; the 5-year survival rate is more than 95% in Japan and more than 65% in the United States. In high-risk populations, secondary prevention measures linked to screening programs have been instituted.[6] In Japan, endoscopic resection techniques have been refined and could possibly be responsible for drastic reductions in mortality rates in the presence of steady incidence rates. This hypothesis, however, has not been tested in clinical trials. For more information, see Stomach (Gastric) Cancer Screening.

### References

Bray F, Laversanne M, Sung H, et al.: Global cancer statistics 2022: GLOBOCAN estimates of incidence and mortality worldwide for 36 cancers in 185 countries. CA Cancer J Clin 74 (3): 229-263, 2024.38572751
American Cancer Society: Cancer Facts and Figures 2025. American Cancer Society, 2025. Available online (https://www.cancer.org/content/dam/cancer-org/research/cancer-facts-and-statistics/annual-cancer-facts-and-figures/2025/2025-cancer-facts-and-figures-acs.pdf). Last accessed January 16, 2025.
Surveillance Research Program, National Cancer Institute: SEER*Explorer: An interactive website for SEER cancer statistics. Bethesda, MD: National Cancer Institute. Available online (https://seer.cancer.gov/statistics-network/explorer/). Last accessed December 30, 2024.
Qiu D, Tanaka S: International comparisons of cumulative risk of stomach cancer, from Cancer Incidence in Five Continents Vol. VIII. Jpn J Clin Oncol 36 (2): 123-4, 2006.16517837
Stomach. In: Ries LA, Kosary CL, Hankey BF, et al., eds.: SEER Cancer Statistics Review 1973-1995. National Cancer Institute, 1998, Section 13.
Tan YK, Fielding JW: Early diagnosis of early gastric cancer. Eur J Gastroenterol Hepatol 18 (8): 821-9, 2006.16825897

## Pathogenesis

Understanding of the pathogenesis of gastric cancer has advanced over the years. A lengthy precancerous process has been identified in which the gastric mucosa is slowly transformed from normal to chronic gastritis, to multifocal atrophy, to intestinal metaplasia of various degrees, to dysplasia, and then to invasive carcinoma.[1] The process is apparently driven by forces acting on the gastric epithelium for many years, such as excessive dietary salt and, most prominently, infection with Helicobacter pylori.

### References

Correa P: Human gastric carcinogenesis: a multistep and multifactorial process--First American Cancer Society Award Lecture on Cancer Epidemiology and Prevention. Cancer Res 52 (24): 6735-40, 1992.1458460 93092113

## Interventions for Reduction of Stomach (Gastric) Cancer Risk

### Smoking Cessation

Studies have shown that smoking is a key risk factor for gastric cancer. A systematic review and meta-analysis showed a 60% increase in gastric cancer in male smokers and a 20% increase in gastric cancer in female smokers compared with nonsmokers.[1] Another systematic review of studies addressed the relationship between cigarette smoking and gastric cancer by estimating the magnitude of the association for different levels of exposure to cancer. It provides solid evidence that smoking is the most important behavioral risk factor for gastric cancer.[1-3] The risk of stomach cancer decreases among former smokers, compared with persistent smokers, with time since cessation. The pattern that emerges from these observations makes it reasonable to infer that cigarette smoking prevention or cessation would result in a decreased risk of gastric cancer.

### H. Pylori Infection Eradication

Helicobacter pylori infection is an accepted cause of gastric adenocarcinoma.[4,5] Questions remain concerning the natural history of H. pylori infection, and the mechanism of transmission and the rates of reinfection or recurrence for different populations are unknown.[6,7] A small randomized trial of antibiotic eradication in 140 H. pylori-infected people suggested the possibility of transmission among close family members.[8] In 70 participants, only the participant received eradication therapy; in the other 70 participants, all H. pylori-infected family members living with the primary participant also received the eradication therapy. Nine months after the therapy, the positivity rates in the index participants in each group were 38.6% and 7.1%, respectively (odds ratio, 8.61; 95% confidence interval [CI], 2.91–22.84), suggesting the possibility of transmission from untreated, infected family members.

Because about half of the world population is infected with H. pylori, antibacterial treatment for all people who are chronically infected may be impractical and could trigger antimicrobial resistance. Vaccination against H. pylori has been shown effective in experimental animal models. Such efficacy has not been studied in humans.

A randomized controlled trial (RCT) of 3,365 participants from a nutritionally deprived population showed that short-term treatment with amoxicillin and omeprazole reduced the incidence of gastric cancer by 39% during a period of 15 years following randomization.[9] With follow-up to 22 years, H. pylori treatment was associated with an absolute reduction in the risk of gastric cancer death of 16 cases per 1,000 individuals. For vitamin supplementation, the absolute risk reduction was 19 cases per 1,000 individuals; for garlic supplementation, it was 10 cases per 1,000 individuals. H. pylori treatment and vitamin supplementation were also associated with absolute reductions in gastric cancer incidence of 33 cases and 19 cases per 1,000 individuals, respectively.[10]

The magnitude of benefit of treating H. pylori in populations with different levels of gastric cancer risk has been unclear. A systematic review and meta-analysis of RCTs and observational studies assessed the treatment of H. pylori with curative regimens for three different clinical scenarios:[11]

- Asymptomatic patients.
- Patients with atrophic gastritis and intestinal metaplasia.
- Patients who have had endoscopic treatment for cancer (who usually have remaining advanced atrophic gastritis and are, therefore, at high future risk).

The authors found 24 eligible studies (22 from Asia) with 715 incident gastric cancers among 48,000 individuals in 340,000 person-years of follow-up. Individuals with eradication treatment for H. pylori had a lower incidence of gastric cancer (pooled incidence rate ratio, 0.53; 95% CI, 0.44–0.64). Treatment was associated with a substantially lower risk in individuals who had asymptomatic infection (pooled incidence rate ratio, 0.62; 95% CI, 0.49–0.79) and in individuals after endoscopic resection of gastric cancer (pooled incidence rate ratio, 0.46; 95% CI, 0.35–0.60). Risk was not lower in those in the lowest tertile of gastric cancer incidence. Limitations of the study included a lack of consideration of the negative effects of treatment, such as antibiotic resistance of H. pylori and other microorganisms. In addition, eradication of H. pylori might reduce a postulated protective effect of H. pylori for esophageal adenocarcinoma. The results may have implications for the treatment of some subgroups of individuals at particularly high risk for stomach cancer, such as Asian immigrant populations in the United States and individuals with underlying gastric mucosal disease such as atrophic gastritis. The results may also have implications for the prevention of recurrent gastric cancer.[11]

Proton pump inhibitor (PPI) use is associated with worsening of gastric atrophy, particularly in H. pylori–infected individuals. One study analyzed 63,397 patients who were included in a territory-wide health database in Hong Kong. These patients had been treated for H. pylori between 2003 and 2012 and had appeared to be cleared of the infection. The results suggested more than a twofold increase in risk of gastric cancer for those who used PPIs after H. pylori treatment, relative to those who did not use PPIs after H. pylori treatment.[12] Because the finding could be caused by residual confounding or detection bias, its relevance to clinical practice is uncertain.

### References

Ladeiras-Lopes R, Pereira AK, Nogueira A, et al.: Smoking and gastric cancer: systematic review and meta-analysis of cohort studies. Cancer Causes Control 19 (7): 689-701, 2008.18293090
González CA, Pera G, Agudo A, et al.: Smoking and the risk of gastric cancer in the European Prospective Investigation Into Cancer and Nutrition (EPIC). Int J Cancer 107 (4): 629-34, 2003.14520702
La Torre G, Chiaradia G, Gianfagna F, et al.: Smoking status and gastric cancer risk: an updated meta-analysis of case-control studies published in the past ten years. Tumori 95 (1): 13-22, 2009 Jan-Feb.19366050
IARC Working Group on the Evaluation of Carcinogenic Risks to Humans: A review of human carcinogens--Part B: biological agents. Volume 100. IARC Press, 2011.
Bouvard V, Baan R, Straif K, et al.: A review of human carcinogens--Part B: biological agents. Lancet Oncol 10 (4): 321-2, 2009.19350698
Cheung TK, Xia HH, Wong BC: Helicobacter pylori eradication for gastric cancer prevention. J Gastroenterol 42 (Suppl 17): 10-5, 2007.17238019
de Vries AC, Haringsma J, Kuipers EJ: The detection, surveillance and treatment of premalignant gastric lesions related to Helicobacter pylori infection. Helicobacter 12 (1): 1-15, 2007.17241295
Sari YS, Can D, Tunali V, et al.: H pylori: Treatment for the patient only or the whole family? World J Gastroenterol 14 (8): 1244-7, 2008.18300351
Ma JL, Zhang L, Brown LM, et al.: Fifteen-year effects of Helicobacter pylori, garlic, and vitamin treatments on gastric cancer incidence and mortality. J Natl Cancer Inst 104 (6): 488-92, 2012.22271764
Li WQ, Zhang JY, Ma JL, et al.: Effects of Helicobacter pylori treatment and vitamin and garlic supplementation on gastric cancer incidence and mortality: follow-up of a randomized intervention trial. BMJ 366: l5016, 2019.31511230
Lee YC, Chiang TH, Chou CK, et al.: Association Between Helicobacter pylori Eradication and Gastric Cancer Incidence: A Systematic Review and Meta-analysis. Gastroenterology 150 (5): 1113-1124.e5, 2016.26836587
Cheung KS, Chan EW, Wong AYS, et al.: Long-term proton pump inhibitors and risk of gastric cancer development after treatment for Helicobacter pylori: a population-based study. Gut 67 (1): 28-35, 2018.29089382

## Interventions With Inadequate Evidence as to Whether They Reduce the Risk of Stomach (Gastric) Cancer or Evidence of No Effect

### Diet

Excessive salt intake has been identified as a possible risk factor for gastric cancer in correlation and case-control studies.[1] The daily intake of salt has decreased drastically in most Western countries and in Japan, in part due to public health campaigns to reduce hypertensive diseases. This may be at least partially responsible for declines in gastric cancer rates. There is a consistent association between high salt intake and the risk of gastric cancer.

Epidemiological evidence from case-control and cohort studies suggests that increased intake of fresh fruits and vegetables is associated with decreased gastric cancer rates.[2,3] However, no randomized controlled trials have been done to establish a causal association.

### Dietary Supplements

Because of the evidence for an inverse association between gastric cancer and dietary intake of fruits and vegetables, especially those rich in antioxidants, there has been interest in dietary supplementation with antioxidants.

Dietary indices of micronutrient intake have been calculated and indicate possible protective effects of beta carotene, vitamin A, vitamin E, selenium, vitamin C, or foods that contain these compounds. A chemoprevention trial in China reported a statistically significant reduction in the gastric cancer mortality rate after supplementation with beta carotene, vitamin E, and selenium.[4] The population studied, however, may have been nutritionally deficient, raising questions of generalizability to other populations such as that of the United States. In addition, the experimental design did not permit assessment of the relative effects of beta carotene, vitamin E, and selenium.

Likewise, there was a randomized placebo-controlled trial of 200 mg of oral allitridum (a component of garlic) every day combined with 100 mcg of oral selenium every other day for 1 month of each year over a 3-year period. The study took place in Qixia County (Shandong Province, China), an area with low intake of garlic and low selenium content in their garlic compared with other areas of China.[5] Although designed as a double-blinded trial, researchers noted that allitridum causes a distinctive garlic odor. Investigators randomly assigned 5,033 people, who met at least one of the following criteria: (1) medical history of stomach disorder, (2) family history of tumor, (3) history of smoking, or (4) history of alcohol consumption. The study, published in a Chinese medical journal, was not well described. After a follow-up of up to 11 years, there were 23 gastric cancer cases in the allitridum/selenium group and 30 cases in the placebo group (relative risk [RR] after adjustment for several baseline characteristics, 0.48; 95% confidence interval [CI], 0.21–1.06). Only 60% of the gastric cancers were diagnosed by histopathology. There was a qualitative difference in outcome by sex: RR_men_, 0.36 (95% CI, 0.14–0.92); RR_women_, 1.14 (95% CI, 0.22–5.76). Given the problems with design and reporting of the study, the evidence of benefit (including men) was weak and may not be generalizable to Western countries.

In a randomized, double-blind, chemoprevention trial in Venezuela among a population at increased risk for gastric cancer, a combination of antioxidant vitamins (vitamins C, E, and beta carotene) failed to modify progression or regression of precancerous gastric lesions.[6] Another potential explanation for the lack of benefit of vitamin supplementation in this trial was the high prevalence of advanced premalignant lesions and the high Helicobacter pylori infection rate.[7]

A secondary analysis of the Alpha-Tocopherol Beta Carotene trial conducted in male smokers in Finland evaluated the effect of supplementation on gastric cancer incidence.[8] No protective effects for these supplements against gastric cancer were observed. Six-year follow-up results of a study of 976 Colombian patients have been reported. Patients were randomly assigned to receive eight different treatments that included vitamin supplements and anti-H. pylori therapy either alone or in combination versus placebo. Among the 79 patients who received anti-H. pylori therapy, a borderline statistically significant regression of intestinal metaplasia compared with a placebo (15% vs. 6%; RR, 3.1; 95% CI, 1.0–9.3) was noted. However, the combinations of antibiotics and vitamins did not confer additional benefits. More importantly, the progression rate of intestinal metaplasia was comparable regardless of the treatments received. The progression rate was 23% in the placebo group and 17% in antibiotic recipients.[9]

A systematic review examined randomized trials of antioxidant dietary supplements for the prevention of gastrointestinal cancers, including gastric cancer.[10] Twenty trials were identified that assessed the preventive effects of antioxidant supplements or vitamin C on gastrointestinal cancer. With regard to gastric cancer, there were 12 comparisons of one or more micronutrients with placebo: beta-carotene alone (4 trials); vitamin C alone (1 trial); vitamin E alone (1 trial); vitamin A plus beta-carotene (1 trial); beta-carotene plus vitamin C (1 trial); beta-carotene plus vitamin E (1 trial); beta-carotene plus vitamins C and E (1 trial); selenium plus vitamins C and E (1 trial); and beta-carotene, vitamins C and E, and selenium (1 trial). None of the comparisons showed a statistically significant effect on the incidence of gastric cancer. The overall summary estimate across all trials of antioxidants showed no statistically significant effect (RR of gastric cancer, 1.14; 95% CI, 0.97–1.33). After treatment of 2.1 to 12 years and follow-up for as many as 14.1 years, approximately 0.51% of participants in the combined antioxidant groups developed gastric cancer versus 0.38% in the placebo groups. In the combined analysis of all 20 trials of antioxidants for the prevention of gastrointestinal cancers, a fixed effects model showed an increase in overall mortality for antioxidants compared with placebo (RR for mortality, 1.04; 95% CI, 1.02–1.07). A random effects model showed no such increase (RR for mortality, 1.02; 95% CI, 0.97–1.07).

### References

D'Elia L, Galletti F, Strazzullo P: Dietary salt intake and risk of gastric cancer. Cancer Treat Res 159: 83-95, 2014.24114476
Buiatti E, Palli D, Decarli A, et al.: A case-control study of gastric cancer and diet in Italy: II. Association with nutrients. Int J Cancer 45 (5): 896-901, 1990.2335393 90243376
Pisters PWT, Kelsen DP, Tepper JE: Cancer of the stomach. In: DeVita VT Jr, Hellman S, Rosenberg SA, eds.: Cancer: Principles and Practice of Oncology. Vols. 1 & 2. 8th ed. Lippincott Williams & Wilkins, 2008, pp 1043-1079.
Blot WJ, Li JY, Taylor PR, et al.: Nutrition intervention trials in Linxian, China: supplementation with specific vitamin/mineral combinations, cancer incidence, and disease-specific mortality in the general population. J Natl Cancer Inst 85 (18): 1483-92, 1993.8360931 93367833
Li H, Li HQ, Wang Y, et al.: An intervention study to prevent gastric cancer by micro-selenium and large dose of allitridum. Chin Med J (Engl) 117 (8): 1155-60, 2004.15361287
Plummer M, Vivas J, Lopez G, et al.: Chemoprevention of precancerous gastric lesions with antioxidant vitamin supplementation: a randomized trial in a high-risk population. J Natl Cancer Inst 99 (2): 137-46, 2007.17227997
Taylor PR: Prevention of gastric cancer: a miss. J Natl Cancer Inst 99 (2): 101-3, 2007.17227989
Malila N, Taylor PR, Virtanen MJ, et al.: Effects of alpha-tocopherol and beta-carotene supplementation on gastric cancer incidence in male smokers (ATBC Study, Finland). Cancer Causes Control 13 (7): 617-23, 2002.12296509
Correa P, Fontham ET, Bravo JC, et al.: Chemoprevention of gastric dysplasia: randomized trial of antioxidant supplements and anti-helicobacter pylori therapy. J Natl Cancer Inst 92 (23): 1881-8, 2000.11106679
Bjelakovic G, Nikolova D, Simonetti RG, et al.: Antioxidant supplements for preventing gastrointestinal cancers. Cochrane Database Syst Rev (3): CD004183, 2008.18677777

## Latest Updates to This Summary (04/07/2025)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

Incidence and Mortality

Updated statistics with estimated new cases and deaths for the United States for 2025 and worldwide for 2022 (cited Bray et al. as reference 1 and American Cancer Society as reference 2). Also revised text to state that age-standardized annual incidence rates vary widely across the world: from 3.6 to 23.0 cases per 100,000 in men, and from 3.3 to 9.7 cases per 100,000 in women.

This summary is written and maintained by the PDQ Screening and Prevention Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/screening-prevention), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about stomach (gastric) cancer prevention. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Screening and Prevention Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/screening-prevention), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Screening and Prevention Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Screening and Prevention Editorial Board. PDQ Stomach (Gastric) Cancer Prevention. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/stomach/hp/stomach-prevention-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389263]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

The information in these summaries should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).